# Genetics of Gastric Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of gastric cancers. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Gastric cancer is one of the most commonly diagnosed cancers in the world, with an incidence of over 1 million cases and an estimated 769,000 deaths occurring in 2020. Globally, this cancer ranked fifth for cancer incidence and fourth for cancer mortality in 2020.[1,2] In 2025, there will be an estimated 30,300 new cases of gastric cancer and 10,780 deaths from gastric cancer in the United States.[3] In clinic-based populations, approximately 15% to 20% of patients with gastric cancer are found to have pathogenic variants in hereditary cancer genes.[4,5]

The genes that can predispose individuals to hereditary diffuse gastric cancer (HDGC) include the following:

- CDH1.
- CTNNA1.

HDGC is the most common hereditary cancer syndrome that can predispose individuals to gastric cancer. This disease does not have an easily detectable precursor lesion. For more information, see Hereditary Diffuse Gastric Cancer.

There are also hereditary cancer syndromes that can cause other forms of gastric cancer. These syndromes include the following:

- Lynch syndrome: Lynch syndrome is caused by pathogenic variants in MLH1, MSH2, MSH6, PMS2, and EPCAM. The amount of gastric cancer risk associated with Lynch syndrome and the role of gastric cancer screening remain unknown, especially since a Lynch syndrome–associated gastric cancer precursor has not yet been identified.[6]
- Familial adenomatous polyposis (FAP)/gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS): FAP/GAPPS are caused by pathogenic variants in APC. Gastric cancer is typically preceded by fundic gland polyps.[7]
- Peutz-Jeghers syndrome (PJS): PJS is caused by pathogenic variants in STK11. Gastric cancer is typically preceded by hamartomatous polyps.[8]
- Juvenile polyposis syndrome (JPS): JPS is caused by pathogenic variants in SMAD4 and BMPR1A. Gastric cancer is typically preceded by hamartomatous polyps.

In each of these syndromes, gastric polyps and gastric cancer risk are of secondary importance to colorectal polyps and colorectal cancer. Gastric polyp burden (including polyp count and size) and gastric cancer risk may vary between individuals.

For more information on these genetic syndromes, see Table 1.

### Gastric Cancer Risk Factors

#### Environmental risk factors

Incidence rates for gastric cancer are the highest in Eastern Asia and Eastern Europe, while the rates in Northern America, Northern Europe, and Africa are generally low.[2] These regional differences are most likely affected by environmental and hereditary risk factors.

Environmental risk factors for gastric cancer include the following:

1. Helicobacter pylori (H. pylori) infection.

- This may be most the impactful environmental risk factor for gastric cancer.
- An H. pylori infection may cause histological changes in the stomach, which can begin with chronic, active gastritis and can progress to gastric atrophy, intestinal metaplasia, gastric dysplasia, and eventually gastric cancer.[9,10]
- The combination of H. pylori and germline pathogenic variants in homologous recombination genes (ATM, BRCA1, BRCA2, and PALB2) increases the risk of gastric cancer in an additive manner. A study of 38,153 controls and 10,426 gastric cancer cases in Japan found that germline pathogenic variants in nine genes (APC, ATM, BRCA1, BRCA2, CDH1, MLH1, MSH2, MSH6, and PALB2) were associated with increased gastric cancer risk.[11] The relative risk (RR) of gastric cancer in those with H. pylori and a pathogenic variant in one of four homologous recombination genes was 16.01 (confidence interval, 2.22–29.8). Risk persisted after adjusting for environmental risk factors like smoking, obesity, and salt intake. There was no increased risk in those who had H. pylori and a pathogenic variant in a mismatch repair gene. The authors noted that results primarily pertain to the Japanese population, since gastric cancer and H. pylori incidence rates are much higher in East Asian populations than in Western populations.

2. Diet.

- The regional variation in gastric cancer incidence is influenced by diet.[12,13]
- Gastric cancer risk may increase when individuals consume foods that are preserved with salt.[13,14]
- Low fruit intake and the consumption of a large amount of processed, grilled, or barbequed meats/fish may also increase gastric cancer risk.[13]

3. Migrant effects.

- Gastric cancer risk may also be affected by migrant effects (i.e., effects incurred when individuals migrate from a region with high gastric cancer risk to a region with low gastric cancer risk or vice versa).
- Studies have demonstrated that the incidence of gastric cancer in immigrants correlates closely with the incidence of gastric cancer in their new host country after one or two generations.[15-17]

4. Tobacco use.[13,14]

5. Alcohol use.[13,14]

6. Emerging evidence for obesity and gastroesophageal reflux disease (GERD).

- Emerging evidence suggests an association between increased gastric cancer risk, excess body weight, and tissue damage associated with GERD.[18,19]

7. Racial and ethnic disparities.

- There are striking racial and ethnic disparities associated with gastric cancer incidence in the United States.[20-25]
- Studies that examine genetic and nongenetic risk factors, such as social determinants of health, are needed to understand and reduce the disparities in gastric cancer incidence that are seen in different racial and ethnic minority groups.

Intensive surveillance may be clinically warranted in individuals with hereditary, environmental, or ethnicity-based gastric cancer risk factors. However, more data are needed to show whether these risk factors increase or decrease gastric cancer risk in individuals with hereditary gastric cancer pathogenic variants. For more information about risk factors for gastric cancer in the general population, see Stomach (Gastric) Cancer Screening.

#### Familial risk factors

Individuals with family histories of gastric cancer have an increased risk of developing gastric cancer.[26] For example, when individuals had a first-degree relative with gastric cancer, their RRs to develop gastric cancer ranged from 1.5-fold to 3.5-fold in seven different studies.[27-33] However, these were retrospective studies, and risk estimates may have been confounded by recall bias (i.e., recalling cancers in relatives), shared environmental factors, shared dietary factors, and different countries that studies were conducted in. The most notable environmental/dietary risk factor was H. pylori infection. When an individual has an H. pylori infection, other people in this individual's family also have an increased chance of developing an H. pylori infection. Smaller cohort studies have suggested the presence of a residual heritable risk for gastric cancer after correcting for the presence of H. pylori. Most of these studies did not account for hereditary gastric cancer pathogenic variants.[34] A large retrospective review of Japanese individuals (both with and without gastric cancer) found a strong, additive risk for gastric cancer in individuals with H. pylori infection, especially in those with ATM, BRCA1, BRCA2, or PALB2 pathogenic variants.[11] A Scandinavian study demonstrated that the concordance value for gastric cancer was higher in monozygotic twins than it was in dizygotic twins. This suggests that gastric cancer risk may be heritable.[35]

Families with multiple gastric cancer cases have also been used to study the heritability of gastric cancer. A report in 1964 described a large, native Maori family from New Zealand.[36] Then, in the late 1990s, another study established genetic linkage between CDH1, a gene that codes for a cell-adhesion molecule, and gastric cancer cases from the original Maori family (identified in 1964) and two additional Maori families. In this study, researchers found that CDH1 was downregulated in Maori individuals with advanced gastric cancer.[36-39] Germline CDH1 pathogenic variants were first found in affected individuals in these Maori families, and later in families around the world with hereditary diffuse gastric cancer. Subsequently, female lobular breast cancer and orofacial clefts were added to the phenotypic spectrum of CDH1 pathogenic variants.[40]

### Precancerous Lesions

In the stomach, gastric adenocarcinoma can arise from visible lesions, from the histological progression of mucosal atrophy or, less commonly, from invisible lesions (i.e., submucosal infiltration, as seen in diffuse-type gastric adenocarcinoma). This section reviews both gastric polyps and the histological changes associated with chronic gastritis that can predispose an individual to gastric cancer.

#### Gastric polyps

Gastric polyps are common in the U.S. population and are found in up to 6% of individuals who undergo endoscopy. However, these polyps rarely progress to become gastric cancer.[41] When gastric polyps are isolated, they usually are sporadic in nature. However, gastric polyps can also be associated with hereditary cancer syndromes, particularly the hamartomatous and polyposis syndromes. Gastric polyps can present with the following pathologies:

- Adenomatous.
- Hyperplastic.
- Inflammatory.
- Hamartomatous (associated with PJS, JPS, and PTEN hamartoma tumor syndromes [PHTS]).
- Fundic gland.[42]

In general, the malignant potential of a polyp is determined by the polyp’s histology, size, and degree of dysplasia, if present. Adenomatous and hyperplastic polyps have the highest malignant potentials, especially when H. pylori is present. In contrast, fundic gland polyps (with or without dysplasia) rarely progress to become gastric cancer, even in individuals who have FAP.[43]

Fundic gland polyps of the stomach are common and typically associated with long-term proton pump inhibitor (PPI) use.[44] Fundic glands polyps generally do not increase gastric cancer risk because these polyps are not neoplastic in nature. However, GAPPS is an exception to this rule. In GAPPS, gastric cancer risk is strongly correlated with fundic gland polyposis. For more information about GAPPS and FAP, see Genetics of Colorectal Cancer and Gastric Adenocarcinoma and Proximal Polyposis of the Stomach.

Inflammatory and hyperplastic polyps can present with many different pathological features. Unlike the colon, in which hyperplastic polyps carry little or no cancer risk, hyperplastic polyps of the stomach can enlarge and develop dysplastic foci.[45] These types of polyps are not clearly associated with known hereditary gastric cancer syndromes.

Hamartomatous polyps are seen in the stomachs of patients with PJS, JPS, and PHTS. For more information on these hereditary cancer syndromes, see Genetics of Colorectal Cancer. Hamartomatous polyps are typically not dysplastic in nature. However, they can develop dysplastic foci. Consequently, these polyps can be associated with an increased gastric cancer risk, especially in individuals with hereditary gastric cancer syndromes. It is unclear if hamartomatous gastric polyps eventually become gastric cancer or if they are merely indicative of a high-risk environment in the stomach. The risk of gastric cancer is estimated by the hereditary cancer syndrome.

Gastric adenomas make up approximately 10% of all gastric polyps. A gastric adenoma’s malignant potential is determined by its histological subtype and size.[46] For example, pyloric gland adenomas and intestinal-type gastric adenomas have the highest malignant potentials, while foveolar-type gastric adenomas have the lowest malignant potential.[47,48]

#### Chronic gastritis

Chronic gastritis, a histological diagnosis defined by the presence of a mononuclear cellular infiltrate in the lamina propria of the stomach, occurs due to environmental exposures or autoimmune gastritis. Chronic gastritis can lead to gastric intestinal metaplasia. H. pylori is the most common risk factor for intestinal metaplasia. Other risk factors for intestinal metaplasia include pernicious anemia, autoimmune gastritis, ethnicity, a family history of gastric cancer, dietary habits, smoking, and alcohol use.[49] After the development of chronic gastritis, the gastric mucosa may undergo a series of progressive changes, known as Correa’s cascade, which can eventually result in gastric cancer.

The steps of Correa's cascade include the following:

1. Chronic gastritis (most commonly caused by H. pylori).
2. Gastric mucosal atrophy.
3. Gastric intestinal metaplasia.
4. Gastric dysplasia (low-grade dysplasia followed by high-grade dysplasia).[50,51]

Although these histological changes are associated with increased gastric cancer risk in the general population, the prevalence of findings and associated cancer risk in hereditary cancer syndromes is unknown. Each step in Correa's cascade only occurs in a minority of patients. There is considerable controversy regarding appropriate surveillance in patients with intestinal metaplasia.[52]

#### Endoscopic assessment

Gastric cancer screening is not routinely performed in the United States, where gastric cancer incidence is relatively low. Gastric cancer screening is also not usually performed in individuals with family histories of gastric cancer in which a hereditary gastric cancer pathogenic variant has not been identified. Large, prospective multicenter studies are needed to determine if gastric cancer screening programs would improve mortality in individuals from the United States with family histories of gastric cancer. In the United States, gastric cancer surveillance guidelines only exist for individuals with pathogenic variants in CDH1 or other gastric cancer risk genes (for more information, see Table 1).[53,54] The International Gastric Cancer Linkage Consortium recommends that individuals with family histories of diffuse gastric cancer without identifiable genetic causes (this is known as HDGC-like syndrome) participate in gastric cancer surveillance.[55] For more information, see the Definition and Management of Hereditary Diffuse Gastric Cancer (HDGC)–Like Families section in Hereditary Diffuse Gastric Cancer.

When evaluating any patient with hereditary gastric cancer risk, endoscopy includes assessment for gastric polyps and H. pylori—despite a lack of evidence demonstrating that H. pylori increases gastric cancer risk in the setting of all hereditary cancer syndromes.[11]

A small focus of intestinal metaplasia in the antrum is shown below. Intestinal metaplasia is not always visible on endoscopy. Instead, it is often found when taking random biopsies of the stomach.[49] Emerging research has identified measures to improve endoscopic detection of such foci. Populations with high gastric intestinal metaplasia and gastric dysplasia prevalence rates have high incidence rates of gastric cancer.[49]

Endoscopic image showing a small area of intestinal metaplasia (circled in yellow) in the antrum of the stomach.

Endoscopic image showing a small area of intestinal metaplasia (circled in yellow) in the antrum of the stomach.

### References

Allemani C, Matsuda T, Di Carlo V, et al.: Global surveillance of trends in cancer survival 2000-14 (CONCORD-3): analysis of individual records for 37 513 025 patients diagnosed with one of 18 cancers from 322 population-based registries in 71 countries. Lancet 391 (10125): 1023-1075, 2018.29395269
Sung H, Ferlay J, Siegel RL, et al.: Global Cancer Statistics 2020: GLOBOCAN Estimates of Incidence and Mortality Worldwide for 36 Cancers in 185 Countries. CA Cancer J Clin 71 (3): 209-249, 2021.33538338
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Uson PLS, Kunze KL, Golafshar MA, et al.: Germline Cancer Testing in Unselected Patients with Gastric and Esophageal Cancers: A Multi-center Prospective Study. Dig Dis Sci 67 (11): 5107-5115, 2022.35122589
Ku GY, Kemel Y, Maron SB, et al.: Prevalence of Germline Alterations on Targeted Tumor-Normal Sequencing of Esophagogastric Cancer. JAMA Netw Open 4 (7): e2114753, 2021.34251444
Møller P, Seppälä TT, Bernstein I, et al.: Cancer risk and survival in path_MMR carriers by gene and gender up to 75 years of age: a report from the Prospective Lynch Syndrome Database. Gut 67 (7): 1306-1316, 2018.28754778
Abraham SC, Nobukawa B, Giardiello FM, et al.: Fundic gland polyps in familial adenomatous polyposis: neoplasms with frequent somatic adenomatous polyposis coli gene alterations. Am J Pathol 157 (3): 747-54, 2000.10980114
Giardiello FM, Brensinger JD, Tersmette AC, et al.: Very high risk of cancer in familial Peutz-Jeghers syndrome. Gastroenterology 119 (6): 1447-53, 2000.11113065 20565550
Correa P, Haenszel W, Cuello C, et al.: A model for gastric cancer epidemiology. Lancet 2 (7924): 58-60, 1975.49653
Hooi JKY, Lai WY, Ng WK, et al.: Global Prevalence of Helicobacter pylori Infection: Systematic Review and Meta-Analysis. Gastroenterology 153 (2): 420-429, 2017.28456631
Usui Y, Taniyama Y, Endo M, et al.: Helicobacter pylori, Homologous-Recombination Genes, and Gastric Cancer. N Engl J Med 388 (13): 1181-1190, 2023.36988593
Tsugane S, Sasazuki S: Diet and the risk of gastric cancer: review of epidemiological evidence. Gastric Cancer 10 (2): 75-83, 2007.17577615
Liu SJ, Huang PD, Xu JM, et al.: Diet and gastric cancer risk: an umbrella review of systematic reviews and meta-analyses of prospective cohort studies. J Cancer Res Clin Oncol 148 (8): 1855-1868, 2022.35695929
Song Y, Liu X, Cheng W, et al.: The global, regional and national burden of stomach cancer and its attributable risk factors from 1990 to 2019. Sci Rep 12 (1): 11542, 2022.35798837
Shimizu H, Mack TM, Ross RK, et al.: Cancer of the gastrointestinal tract among Japanese and white immigrants in Los Angeles County. J Natl Cancer Inst 78 (2): 223-8, 1987.3468285
Mousavi SM, Brandt A, Weires M, et al.: Cancer incidence among Iranian immigrants in Sweden and Iranian residents compared to the native Swedish population. Eur J Cancer 46 (3): 599-605, 2010.19892547
Lee J, Demissie K, Lu SE, et al.: Cancer incidence among Korean-American immigrants in the United States and native Koreans in South Korea. Cancer Control 14 (1): 78-85, 2007.17242674
Bouras E, Tsilidis KK, Triggi M, et al.: Diet and Risk of Gastric Cancer: An Umbrella Review. Nutrients 14 (9): , 2022.35565732
Poly TN, Lin MC, Syed-Abdul S, et al.: Proton Pump Inhibitor Use and Risk of Gastric Cancer: Current Evidence from Epidemiological Studies and Critical Appraisal. Cancers (Basel) 14 (13): , 2022.35804824
Shah SC, McKinley M, Gupta S, et al.: Population-Based Analysis of Differences in Gastric Cancer Incidence Among Races and Ethnicities in Individuals Age 50 Years and Older. Gastroenterology 159 (5): 1705-1714.e2, 2020.32771406
Anderson WF, Rabkin CS, Turner N, et al.: The Changing Face of Noncardia Gastric Cancer Incidence Among US Non-Hispanic Whites. J Natl Cancer Inst 110 (6): 608-615, 2018.29361173
Islami F, DeSantis CE, Jemal A: Incidence Trends of Esophageal and Gastric Cancer Subtypes by Race, Ethnicity, and Age in the United States, 1997-2014. Clin Gastroenterol Hepatol 17 (3): 429-439, 2019.29902641
Holowatyj AN, Ulrich CM, Lewis MA: Racial/Ethnic Patterns of Young-Onset Noncardia Gastric Cancer. Cancer Prev Res (Phila) 12 (11): 771-780, 2019.31420363
De B, Rhome R, Jairam V, et al.: Gastric adenocarcinoma in young adult patients: patterns of care and survival in the United States. Gastric Cancer 21 (6): 889-899, 2018.29691758
Gupta S, Tao L, Murphy JD, et al.: Race/Ethnicity-, Socioeconomic Status-, and Anatomic Subsite-Specific Risks for Gastric Cancer. Gastroenterology 156 (1): 59-62.e4, 2019.30267713
Hemminki K, Sundquist J, Ji J: Familial risk for gastric carcinoma: an updated study from Sweden. Br J Cancer 96 (8): 1272-7, 2007.17406355
Yaghoobi M, Bijarchi R, Narod SA: Family history and the risk of gastric cancer. Br J Cancer 102 (2): 237-42, 2010.19888225
Lissowska J, Groves FD, Sobin LH, et al.: Family history and risk of stomach cancer in Warsaw, Poland. Eur J Cancer Prev 8 (3): 223-7, 1999.10443951
Palli D, Russo A, Ottini L, et al.: Red meat, family history, and increased risk of gastric cancer with microsatellite instability. Cancer Res 61 (14): 5415-9, 2001.11454685
Dhillon PK, Farrow DC, Vaughan TL, et al.: Family history of cancer and risk of esophageal and gastric cancers in the United States. Int J Cancer 93 (1): 148-52, 2001.11391635
Minami Y, Tateno H: Associations between cigarette smoking and the risk of four leading cancers in Miyagi Prefecture, Japan: a multi-site case-control study. Cancer Sci 94 (6): 540-7, 2003.14529588
Eto K, Ohyama S, Yamaguchi T, et al.: Familial clustering in subgroups of gastric cancer stratified by histology, age group and location. Eur J Surg Oncol 32 (7): 743-8, 2006.16762526
Chen MJ, Wu DC, Ko YC, et al.: Personal history and family history as a predictor of gastric cardiac adenocarcinoma risk: a case-control study in Taiwan. Am J Gastroenterol 99 (7): 1250-7, 2004.15233662
Yatsuya H, Toyoshima H, Tamakoshi A, et al.: Individual and joint impact of family history and Helicobacter pylori infection on the risk of stomach cancer: a nested case-control study. Br J Cancer 91 (5): 929-34, 2004.15280918
Lichtenstein P, Holm NV, Verkasalo PK, et al.: Environmental and heritable factors in the causation of cancer--analyses of cohorts of twins from Sweden, Denmark, and Finland. N Engl J Med 343 (2): 78-85, 2000.10891514 20331418
JONES EG: FAMILIAL GASTRIC CANCER. N Z Med J 63: 287-96, 1964.14158754
Guilford P, Hopkins J, Harraway J, et al.: E-cadherin germline mutations in familial gastric cancer. Nature 392 (6674): 402-5, 1998.9537325
Guilford PJ, Hopkins JB, Grady WM, et al.: E-cadherin germline mutations define an inherited cancer syndrome dominated by diffuse gastric cancer. Hum Mutat 14 (3): 249-55, 1999.10477433
Corso G, Marrelli D, Pascale V, et al.: Frequency of CDH1 germline mutations in gastric carcinoma coming from high- and low-risk areas: metanalysis and systematic review of the literature. BMC Cancer 12: 8, 2012.22225527
Brooks-Wilson AR, Kaurah P, Suriano G, et al.: Germline E-cadherin mutations in hereditary diffuse gastric cancer: assessment of 42 new families and review of genetic screening criteria. J Med Genet 41 (7): 508-17, 2004.15235021
Carmack SW, Genta RM, Schuler CM, et al.: The current spectrum of gastric polyps: a 1-year national study of over 120,000 patients. Am J Gastroenterol 104 (6): 1524-32, 2009.19491866
Gullo I, Grillo F, Mastracci L, et al.: Precancerous lesions of the stomach, gastric cancer and hereditary gastric cancer syndromes. Pathologica 112 (3): 166-185, 2020.33179620
Mankaney G, Leone P, Cruise M, et al.: Gastric cancer in FAP: a concerning rise in incidence. Fam Cancer 16 (3): 371-376, 2017.28185118
Martin FC, Chenevix-Trench G, Yeomans ND: Systematic review with meta-analysis: fundic gland polyps and proton pump inhibitors. Aliment Pharmacol Ther 44 (9): 915-925, 2016.27634363
Jain R, Chetty R: Gastric hyperplastic polyps: a review. Dig Dis Sci 54 (9): 1839-46, 2009.19037727
Stolte M, Sticht T, Eidt S, et al.: Frequency, location, and age and sex distribution of various types of gastric polyp. Endoscopy 26 (8): 659-65, 1994.7859674
Abraham SC, Park SJ, Lee JH, et al.: Genetic alterations in gastric adenomas of intestinal and foveolar phenotypes. Mod Pathol 16 (8): 786-95, 2003.12920223
Chen ZM, Scudiere JR, Abraham SC, et al.: Pyloric gland adenoma: an entity distinct from gastric foveolar type adenoma. Am J Surg Pathol 33 (2): 186-93, 2009.18830123
Altayar O, Davitkov P, Shah SC, et al.: AGA Technical Review on Gastric Intestinal Metaplasia-Epidemiology and Risk Factors. Gastroenterology 158 (3): 732-744.e16, 2020.31816301
Correa P: Human gastric carcinogenesis: a multistep and multifactorial process--First American Cancer Society Award Lecture on Cancer Epidemiology and Prevention. Cancer Res 52 (24): 6735-40, 1992.1458460 93092113
Neumann WL, Coss E, Rugge M, et al.: Autoimmune atrophic gastritis--pathogenesis, pathology and management. Nat Rev Gastroenterol Hepatol 10 (9): 529-41, 2013.23774773
Dinis-Ribeiro M, Kuipers EJ: How to Manage a Patient With Gastric Intestinal Metaplasia: An International Perspective. Gastroenterology 158 (6): 1534-1537, 2020.31926996
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 3.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed October 17, 2024.
Blair VR, McLeod M, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical practice guidelines. Lancet Oncol 21 (8): e386-e397, 2020.32758476

## Genetic Evaluation in Individuals With Personal and/or Family Histories of Gastric Cancer

Approximately 15% to 20% of gastric cancers may be caused by hereditary gastric cancer syndromes.[1-3] When providers suspect that an individual has a hereditary gastric cancer syndrome, it is recommended that they obtain a detailed, three-generation family history and perform genetic testing, if appropriate. The collection of a detailed personal and family history is integral for gastric cancer risk assessment.

The following items are important to elicit when collecting a patient's family history:

- Number of relatives with cancers on the same side of the family.
- Types of cancers seen in family members (including each cancer's histological subtype).^a^
- Ages of family members when they were diagnosed with cancer.
- Family members' gastrointestinal polyp histories (including each polyp's histological subtype).
- Number of family members with cleft lip or cleft palate (cleft lip or cleft palate has been linked to CDH1-associated hereditary gastric cancer).[4]

^a^ [Note: It is recommended that family history analysis focus on gastric cancer and other cancers (such as lobular breast cancer) that may be associated with hereditary diffuse gastric cancer (HDGC).]

For information on collecting a family history, see the Documenting the family history section in Cancer Genetics Risk Assessment and Counseling.

In busy clinical settings, it might not be feasible to obtain a complete family history.[5] Studies have found that people often have incomplete or inaccurate information about the cancers that occurred in their relatives.[6-9] Furthermore, patients often over- or under-report the number of individuals in their families who have had gastric cancer.

Many factors can contribute to inaccurate reporting of a gastric cancer family history. In medicine, the stomach has a distinct definition and anatomical location in the body. The public's definition of the stomach is more ambiguous, which could lead to reporting inaccuracies.[7] There are multiple organs inside the abdominal cavity that patients could confuse with the stomach. Studies have demonstrated that many patients do not know where organs are located in the body.[10]

The poor validity of self-reported gastric cancer family histories needs to be considered during a patient’s genetic evaluation and when creating an individual's clinical management recommendations. Studies have assessed the accuracy of self-reported family histories by comparing collected information with confirmation sources like death certificates, cancer registries, and histopathological records.[6-9,11] One retrospective study from the United Kingdom compared 595 clinical notes to confirmation sources. This study found increased error when patients reported malignancies located in the abdominal cavity.[7] A systematic review found that only 22% to 67% of reported stomach cancer diagnoses were verified by confirmation sources.[11] For more information, see the Accuracy of the family history section in Cancer Genetics Risk Assessment and Counseling.

Obtaining pathological documentation of personal/family histories of cancer and polyps is also integral when assessing a patient’s hereditary gastric cancer risk. This documentation is especially important because genetic testing criteria has shifted over the years and has, in turn, broadened clinical criteria.[12] It is important to obtain pathology reports from patients to confirm the histological subtypes of cancers when possible. Signet ring cell carcinoma, diffuse gastric cancer, and poorly differentiated carcinoma pathologies are characteristic of hereditary gastric cancer syndromes, particularly CDH1-associated HDGC. These histologies are commonly associated with linitis plastica (i.e., diffusely infiltrated, non-distensible stomach). Multiple gastrointestinal polyps (e.g., tubular adenomas, hamartomas) are associated with other hereditary cancer syndromes, such as Peutz-Jeghers syndrome, juvenile polyposis syndrome, familial adenomatous polyposis (FAP)/gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS).[13] Fundic gland polyps are one of the most common findings on routine upper endoscopies. While these fundic gland polyps are a characteristic finding in individuals with FAP, they are also found often in individuals in the general population who take proton pump inhibitors. Hence, fundic gland polyps are not usually indicative of an underlying hereditary cancer syndrome. For more information about the cellular classification of gastric cancers, see Gastric Cancer Treatment.

The diagnosis of cancers before age 50 years is a hallmark feature of hereditary cancer syndromes. Attenuated forms of hereditary cancer syndromes also exist and are increasingly recognized. In these attenuated syndromes, the ages of gastric cancer onset can occur after age 50 years.[14]

### Genetic Testing Approach

Patients who develop gastric cancer usually present at an advanced stage.[15] This is important to consider when selecting a genetic testing approach. Genetic testing is time-sensitive for patients with advanced gastric cancer and should include informed consent, sample collection, and an explanation of genetic test results.[16] However, the timing of genetic testing will need to be balanced with the patient's competing treatment priorities and performance status. For more information, see the Value of testing an affected family member first section in Cancer Genetics Risk Assessment and Counseling.

Germline genetic testing criteria exists for the following genes associated with gastric cancer and/or gastric polyps: CDH1, CTNNA1, APC, STK11, SMAD4, and the Lynch syndrome genes (MLH1, MSH2, MSH6, EPCAM).[12] One possible genetic testing approach is to first test for gene(s) in which clinical criteria for hereditary cancer syndrome(s) are met. This approach may not be ideal when a patient’s family history includes cancers that can be associated with multiple hereditary gastric cancer syndromes. This can create a lengthy and expensive evaluation process if each suspected gene is tested sequentially after uninformative results. When the cancers in a family history overlap with multiple hereditary gastric cancer syndromes, providers can first test the gene(s) at the top of the differential diagnosis list. If pathogenic variants are not identified, providers can then reflex to a larger hereditary gastric cancer multigene panel. If this single-gene genetic testing approach is preferred, providers may need to identify a lab that offers the option to reflex to other genes before beginning the genetic testing process.

When the patient has multiple cancers in the family that overlap with more than one hereditary cancer syndrome, another option is ordering multigene panel testing for all suspected genes. Multigene panel testing is the simultaneous testing of many genes for pathogenic and likely pathogenic variants, often at costs comparable to single-gene genetic testing. Hereditary cancer multigene panel testing includes cancer site-specific panels, high- or moderate-risk gene panels, guideline-based panels, and pancancer panels.[17] Given the numerous panel testing options, clinicians must pay special attention to choose the most appropriate panel of genes based on each individual patient’s differential diagnosis. For instance, genetic testing for pathogenic variants in both CDH1 and CTNNA1 is recommended when testing criteria for HDGC is met. Additionally, analysis of promoter 1B in the APC gene must be included when testing for GAPPS.

For more information about selecting the appropriate genetic test, see the Determining the Test to be Used section in Cancer Genetics Risk Assessment and Counseling.

#### Multigene panel testing implications

This section briefly summarizes the implications for patients undergoing multigene panel testing for hereditary gastric cancer syndromes. For more information about multigene panel testing, including genetic education, counseling considerations, and research, see the Multigene (panel) testing section in Cancer Genetics Risk Assessment and Counseling.

Multigene panel testing can present challenges, including the unexpected discovery of pathogenic variants in genes that would not have been considered based on the patient’s personal and/or family history. Pathogenic variants in many hereditary cancer genes can increase an individual’s risk of developing more than one type of cancer. For instance, CDH1 pathogenic variants are associated with increased risk for both diffuse gastric cancer and lobular breast cancer.[14,18,19] Gastric cancer risk management dilemmas arise when individuals with only a personal and/or family history of breast cancer find an unexpected CDH1 pathogenic variant on multigene panel testing. This test result can complicate medical decision-making, since these individuals would not normally participate in enhanced gastric cancer screening based on their personal or family histories alone. Furthermore, there are no effective gastric cancer screening recommendations for CDH1 carriers. Therefore, all individuals with a pathogenic variant in CDH1 are counseled about the option of risk-reducing total gastrectomy, a surgery with postoperative complication rates as high as 10% and a high likelihood of chronic sequelae.[12,20] The discovery of an unexpected CDH1 variant on multigene panel testing in the absence of a family history of gastric cancer is a challenging situation that is increasingly encountered in clinical practice.[21,22] Pretest genetic counseling is recommended when patients undergo multigene panel testing. Pretest genetic counseling may include a discussion about potential unexpected genetic test findings, and the implications of identifying pathogenic variants in genes that are not well understood, including a review of any limitations associated with cancer risk management recommendations.[22,23]

#### Cascade genetic testing

Cascade genetic testing identifies relatives who are at risk for a genetic condition by following the logical path of a pathogenic variant in a family. Cascade genetic testing is routinely offered to at-risk relatives once a pathogenic variant is identified. For more information, see the Cascade Genetic Testing of Family Members section in Cancer Genetics Risk Assessment and Counseling. In some cases, the patient will already have advanced gastric cancer when a CDH1 pathogenic variant is found. Many patients do not have symptoms of gastric cancer until it has advanced to later stages. Gastric cancer is often incurable, and only 31% of patients diagnosed with gastric cancer survive 5 years or more.[15] Patients may be declining when they receive their genetic test results and may be unable to communicate this result to family members. Ideally, probands and clinicians work together to identify at-risk relatives for cascade testing.[24] Since gastric cancer screening is not performed in the general population, cascade genetic testing is critical to identify asymptomatic high-risk individuals who may benefit from personalized gastric cancer management recommendations.

### References

Uson PLS, Kunze KL, Golafshar MA, et al.: Germline Cancer Testing in Unselected Patients with Gastric and Esophageal Cancers: A Multi-center Prospective Study. Dig Dis Sci 67 (11): 5107-5115, 2022.35122589
Ku GY, Kemel Y, Maron SB, et al.: Prevalence of Germline Alterations on Targeted Tumor-Normal Sequencing of Esophagogastric Cancer. JAMA Netw Open 4 (7): e2114753, 2021.34251444
Oliveira C, Pinheiro H, Figueiredo J, et al.: Familial gastric cancer: genetic susceptibility, pathology, and implications for management. Lancet Oncol 16 (2): e60-70, 2015.25638682
Frebourg T, Oliveira C, Hochain P, et al.: Cleft lip/palate and CDH1/E-cadherin mutations in families with hereditary diffuse gastric cancer. J Med Genet 43 (2): 138-42, 2006.15831593
Qureshi N, Wilson B, Santaguida P, et al.: Collection and use of cancer family history in primary care. Evid Rep Technol Assess (Full Rep) (159): 1-84, 2007.18457477
Mitchell RJ, Brewster D, Campbell H, et al.: Accuracy of reporting of family history of colorectal cancer. Gut 53 (2): 291-5, 2004.14724166
Douglas FS, O'Dair LC, Robinson M, et al.: The accuracy of diagnoses as reported in families with cancer: a retrospective study. J Med Genet 36 (4): 309-12, 1999.10227399
Ozanne EM, O'Connell A, Bouzan C, et al.: Bias in the reporting of family history: implications for clinical care. J Genet Couns 21 (4): 547-56, 2012.22237666
Mai PL, Garceau AO, Graubard BI, et al.: Confirmation of family cancer history reported in a population-based survey. J Natl Cancer Inst 103 (10): 788-97, 2011.21562245
Rashid A, Jagger C: Patients' knowledge of anatomical location of major organs within the human body: a comparison between Asians and non-Asians. Fam Pract 13 (5): 450-4, 1996.8902514
Fiederling J, Shams AZ, Haug U: Validity of self-reported family history of cancer: A systematic literature review on selected cancers. Int J Cancer 139 (7): 1449-60, 2016.27222437
Blair VR, McLeod M, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical practice guidelines. Lancet Oncol 21 (8): e386-e397, 2020.32758476
Colvin H, Yamamoto K, Wada N, et al.: Hereditary Gastric Cancer Syndromes. Surg Oncol Clin N Am 24 (4): 765-77, 2015.26363540
Xicola RM, Li S, Rodriguez N, et al.: Clinical features and cancer risk in families with pathogenic CDH1 variants irrespective of clinical criteria. J Med Genet 56 (12): 838-843, 2019.31296550
National Cancer Institute: SEER Cancer Stat Facts: Stomach Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/stomach.html). Last accessed February 21, 2025.
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Domchek SM, Bradbury A, Garber JE, et al.: Multiplex genetic testing for cancer susceptibility: out on the high wire without a net? J Clin Oncol 31 (10): 1267-70, 2013.23460708
Pharoah PD, Guilford P, Caldas C, et al.: Incidence of gastric cancer and breast cancer in CDH1 (E-cadherin) mutation carriers from hereditary diffuse gastric cancer families. Gastroenterology 121 (6): 1348-53, 2001.11729114
Corso G, Intra M, Trentin C, et al.: CDH1 germline mutations and hereditary lobular breast cancer. Fam Cancer 15 (2): 215-9, 2016.26759166
van der Kaaij RT, van Kessel JP, van Dieren JM, et al.: Outcomes after prophylactic gastrectomy for hereditary diffuse gastric cancer. Br J Surg 105 (2): e176-e182, 2018.29341148
Lowstuter K, Espenschied CR, Sturgeon D, et al.: Unexpected CDH1 Mutations Identified on Multigene Panels Pose Clinical Management Challenges. JCO Precis Oncol 1: 1-12, 2017.35172483
Katona BW, Clark DF, Domchek SM: CDH1 on Multigene Panel Testing: Look Before You Leap. J Natl Cancer Inst 112 (4): 330-334, 2020.31841163
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 3.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed October 17, 2024.
Hampel H: Genetic counseling and cascade genetic testing in Lynch syndrome. Fam Cancer 15 (3): 423-7, 2016.26969309

## Major Genes and Genetic Syndromes Associated With Gastric Cancer

The major heritable syndromes associated with increased gastric cancer risk are listed in Table 1, along with their corresponding susceptibility genes. For more information on CDH1- and CTNNA1-associated hereditary gastric cancers, see Hereditary Diffuse Gastric Cancer. The gastric cancer risk of the other syndromes in this table are described throughout this summary, and hyperlinks have also been provided to other PDQ summaries with additional information.

Table 1. Hereditary Syndromes Associated With Increased Gastric Cancer Risk

Syndrome^a^ | Gene | Gastric Cancer Risk | Gastric Cancer Pathology | Gastric Cancer Surveillance | Other Characteristics
Hereditary diffuse gastric cancer | CDH1 and CTNNA1 | 33%–83% [1-5] | Diffuse type, signet ring cell carcinoma | EGD with multiple random biopsies of the stomach every 6–12 mo or risk-reducing total gastrectomy between ages 18–40 y^c^ [6] | For CDH1 only: Lobular breast cancer, cleft lip or cleft palate. It is currently unknown whether CTNNA1 is associated with lobular breast cancer or cleft lip or cleft palate
Familial adenomatous polyposis syndrome (FAP) | APC | 1.3%–5% in FAP and AFAP.[7,8] | Intestinal type | EGD for duodenal surveillance is also adequate surveillance for gastric cancers. Gastrectomy can be considered for patients with high-risk lesions that cannot be managed endoscopically^b^ [9] | Gastric polyps (fundic gland polyps and adenomas), CRC, colorectal polyps (adenomas), desmoid tumors, duodenal tumors and cancer, thyroid cancer, brain cancer, ampullary cancer, pancreatic cancer, hepatoblastoma
Attenuated familial adenomatous polyposis (AFAP) | APC | 1.3%–5% in FAP and AFAP.[7,8] | Intestinal type | EGD for duodenal surveillance is also adequate surveillance for gastric cancers. Gastrectomy can be considered for patients with high-risk lesions that cannot be managed endoscopically^b^ [9]
Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) | APC (pathogenic variants/single nucleotide variant in the promoter 1B region of APC are associated with GAPPS-7) | In GAPPS, gastric cancer risk is significantly increased, but exact risk numbers are unknown [10] | Intestinal type | EGD for duodenal surveillance is also adequate surveillance for gastric cancers. Gastrectomy can be considered for patients with high-risk lesions that cannot be managed endoscopically^b^ [9]
Lynch syndrome (also known as hereditary nonpolyposis colorectal cancer [HNPCC]) | MLH1, MSH2, MSH6, PMS2, EPCAM | 0.2%–9% | Intestinal type | Upper GI surveillance with EGD (preferably performed in conjunction with colonoscopy) starting at age 30–40 y (or earlier based on the patient's family history). Repeat EGD every 2–4 y [9] | CRC, endometrial cancer, ovarian cancer, breast cancer, pancreatic cancer, bladder cancer, biliary tract cancer, urothelial cancer, small bowel cancer, prostate cancer, brain/CNS tumor
Peutz-Jeghers syndrome | STK11 (also known as LKB1) | 29% [9] | Intestinal type (arising from dysplasia in hamartomas) | EGD every 2–3 y beginning in the late adolescence [9] | Hamartomatous GI polyps; breast cancer; CRC; small bowel cancer; pancreatic cancer; Sertoli cell tumors of the ovary and testes; cervical adenoma malignum; endometrial cancer; lung cancer; mucocutaneous hyperpigmentation of the mouth, lips, nose, eyes, genitalia and/or fingers
Juvenile polyposis syndrome | SMAD4, BMPR1A | 21% if multiple polyps are present | Intestinal type (arising from dysplasia in juvenile polyps/hamartomas) | EGD every 2–3 y. If polyps are found, conduct EGD at shorter intervals based on polyp size, number, and pathology [9] | Juvenile/hamartomatous colorectal polyps, CRC, hereditary hemorrhagic telangiectasia
Li-Fraumeni syndrome | TP53 | 2.8% | Possibly intestinal type | | Breast cancer, adrenocortical carcinoma, sarcoma, brain/CNS tumor, leukemia

CNS = central nervous system; CRC = colorectal cancer; EGD = esophagogastroduodenoscopy; GI = gastrointestinal; GIST = gastrointestinal stromal tumor.

^a^All conditions are inherited in an autosomal dominant fashion, unless otherwise specified.

^b^High-risk lesions include tubular adenomas, polyps with high-grade dysplasia, and pyloric gland adenomas.

^c^Prophylactic total gastrectomy is not recommended prior to age 40 y. However, it may be considered for certain patients, especially those with family histories of gastric cancer prior to age 25 y.

### References

Roberts ME, Ranola JMO, Marshall ML, et al.: Comparison of CDH1 Penetrance Estimates in Clinically Ascertained Families vs Families Ascertained for Multiple Gastric Cancers. JAMA Oncol 5 (9): 1325-1331, 2019.31246251
Pharoah PD, Guilford P, Caldas C, et al.: Incidence of gastric cancer and breast cancer in CDH1 (E-cadherin) mutation carriers from hereditary diffuse gastric cancer families. Gastroenterology 121 (6): 1348-53, 2001.11729114
Hansford S, Kaurah P, Li-Chang H, et al.: Hereditary Diffuse Gastric Cancer Syndrome: CDH1 Mutations and Beyond. JAMA Oncol 1 (1): 23-32, 2015.26182300
Kaurah P, MacMillan A, Boyd N, et al.: Founder and recurrent CDH1 mutations in families with hereditary diffuse gastric cancer. JAMA 297 (21): 2360-72, 2007.17545690
Xicola RM, Li S, Rodriguez N, et al.: Clinical features and cancer risk in families with pathogenic CDH1 variants irrespective of clinical criteria. J Med Genet 56 (12): 838-843, 2019.31296550
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Gastric Cancer. Version 1.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/gastric.pdf) Last accessed October 17, 2024.
Cannon AR, Keener M, Neklason D, et al.: Surgical Interventions, Malignancies, and Causes of Death in a FAP Patient Registry. J Gastrointest Surg 25 (2): 452-456, 2021.31848868
Mankaney G, Leone P, Cruise M, et al.: Gastric cancer in FAP: a concerning rise in incidence. Fam Cancer 16 (3): 371-376, 2017.28185118
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 1.2023. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed June 28, 2023.
Li J, Woods SL, Healey S, et al.: Point Mutations in Exon 1B of APC Reveal Gastric Adenocarcinoma and Proximal Polyposis of the Stomach as a Familial Adenomatous Polyposis Variant. Am J Hum Genet 98 (5): 830-842, 2016.27087319

## Other Genes Associated With Gastric Cancer

Preliminary evidence has linked gastric cancer to other genes that are not typically associated with this type of cancer, such as ATM, BRCA1, BRCA2, BRIP1, PALB2, and RAD51D. Studies suggest a possible association between gastric cancer risk and pathogenic variants in both established gastric cancer genes and in moderate- and high-risk genes that are not typically associated with gastric cancer. However, clinical practice changes are not indicated based on this preliminary evidence.

Several studies searched for candidate genes in hereditary gastric cancer cases that were not associated with CDH1 pathogenic variants. Some of these cases may be explained by pathogenic variants in homologous recombination (HR) DNA repair genes, particularly PALB2:

- One of the first studies to identify variants that may increase gastric cancer risk performed whole-exome sequencing (WES) in 28 patients and sequenced candidate genes in 333 patients.[1] In 11 cases, pathogenic variants were identified in genes that regulate HR, including eight PALB2 pathogenic variants, two BRCA1 pathogenic variants, and one RAD51C pathogenic variant. WES in four tumor samples (from three PALB2 carriers and one RAD51C carrier) did not find a loss of heterozygosity (LOH). However, all of the tumors (4/4) were enriched for a mutational signature that is characteristic of HR defects, suggesting a causal link between these genes and gastric cancer risk.
- Another study of 28 CDH1-negative individuals with clinical diagnoses of hereditary diffuse gastric cancer used WES.[2] A PALB2 loss-of-function variant was found in one patient with a history of gastric cancer and breast cancer. Two pathogenic variants were also identified in MSH2 (mismatch repair gene), and two variants were identified in RECQL5 (DNA repair gene).
- In a large investigation of cancer predisposition variants, 5 of 443 patients with gastric cancer carried PALB2 loss-of-function variants with variable LOH (2 of 5 tumors), similar to that seen in other PALB2-associated tumors.[3]
- However, a study of 58 patients who met clinical criteria for hereditary diffuse gastric cancer but tested negative for CDH1 pathogenic variants reported conflicting findings.[4] Unlike similar studies, PALB2 sequencing did not discover pathogenic variants in these patients.

In summary, these findings suggest that defects in HR genes increase risk for gastric cancer and highlight a role for the known cancer predisposition gene, PALB2 as a potential candidate gene for hereditary gastric cancer. However, case-control studies are needed to confirm whether PALB2 is associated with hereditary gastric cancer susceptibility. Gastric cancer screening is not indicated for PALB2 carriers.

Additional studies investigated potential candidate genes for gastric cancer:

- Fifty-one adults with gastric cancer (with any type of histology) were part of an international hereditary cancer research network. These individuals were retrospectively selected to undergo germline genetic testing with a 706–candidate gene genetic testing panel.[5] Twenty pathogenic or likely pathogenic variants were identified in 18 participants (35%). Some of these pathogenic variants were in genes not typically associated with gastric cancer, including ATM, BRCA2, BRIP1, FANCC, and TP53.
- Another study of 34 patients with gastric cancer, who were not selected based on their clinical characteristics or family histories of cancer, found a pathogenic variant rate of 17.6% on a genetic testing panel that examined between 83 and 84 genes.[6] Two pathogenic variants were identified in BRCA1, and one pathogenic variant was identified in each of the following genes: BRCA2, CDH1, FH, and SDHA.
- A cross-sectional study performed at a tertiary cancer center assessed the presence of pathogenic variants on a genetic testing panel that examined 76 or 88 genes in 243 patients with gastric cancer who consented to paired somatic and germline sequencing.[7] A total of 48 patients with gastric cancer (19.8%) had germline pathogenic variants. In high- and moderate-penetrance genes that are not classically associated with gastric cancer, pathogenic variants were found most frequently in BRCA1, BRCA2, and ATM.
- One of the largest studies included 282 patients with gastric cancer who were of Han Chinese descent.[8] These patients were enrolled at medical centers in Beijing and underwent a 69–cancer gene panel, which revealed that 7.1% of patients had pathogenic variants. Pathogenic variants were found most often in ATM (detection rate, 1.1% [3/282 patients]), followed by BRCA1, BRIP1, and RAD51D, which all had a detection rate of 0.7% (2/282 patients).

Additional studies are warranted to determine if there is a causal relationship between these genes and gastric cancer risk. However, the rate of pathogenic variants found in these studies supports the use of multigene panels in patients with gastric cancer undergoing germline genetic testing. For more information, see the Other Cancer Risks section in BRCA1 and BRCA2: Cancer Risks and Management.

### References

Sahasrabudhe R, Lott P, Bohorquez M, et al.: Germline Mutations in PALB2, BRCA1, and RAD51C, Which Regulate DNA Recombination Repair, in Patients With Gastric Cancer. Gastroenterology 152 (5): 983-986.e6, 2017.28024868
Fewings E, Larionov A, Redman J, et al.: Germline pathogenic variants in PALB2 and other cancer-predisposing genes in families with hereditary diffuse gastric cancer without CDH1 mutation: a whole-exome sequencing study. Lancet Gastroenterol Hepatol 3 (7): 489-498, 2018.29706558
Huang KL, Mashl RJ, Wu Y, et al.: Pathogenic Germline Variants in 10,389 Adult Cancers. Cell 173 (2): 355-370.e14, 2018.29625052
Carreño M, Pena-Couso L, Mercadillo F, et al.: Investigation on the Role of PALB2 Gene in CDH1-Negative Patients With Hereditary Diffuse Gastric Cancer. Clin Transl Gastroenterol 11 (12): e00280, 2020.33512806
Slavin T, Neuhausen SL, Rybak C, et al.: Genetic Gastric Cancer Susceptibility in the International Clinical Cancer Genomics Community Research Network. Cancer Genet 216-217: 111-119, 2017.29025585
Uson PLS, Kunze KL, Golafshar MA, et al.: Germline Cancer Testing in Unselected Patients with Gastric and Esophageal Cancers: A Multi-center Prospective Study. Dig Dis Sci 67 (11): 5107-5115, 2022.35122589
Ku GY, Kemel Y, Maron SB, et al.: Prevalence of Germline Alterations on Targeted Tumor-Normal Sequencing of Esophagogastric Cancer. JAMA Netw Open 4 (7): e2114753, 2021.34251444
Ji K, Ao S, He L, et al.: Characteristics of cancer susceptibility genes mutations in 282 patients with gastric adenocarcinoma. Chin J Cancer Res 32 (4): 508-515, 2020.32963463

## Latest Updates to This Summary (05/07/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Introduction

Updated statistics with estimated new cancer cases and deaths for 2025 (cited American Cancer Society as reference 3).

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of gastric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Genetics of Gastric Cancer are:

- Grace-Ann O. Fasaye, ScM, CGC (National Cancer Institute)
- Gautam Mankaney, MD (Virginia Mason Franciscan Health)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Genetics of Gastric Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/stomach/hp/gastric-genetics-pdq. Accessed <MM/DD/YYYY>. [PMID: 37669413]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).